# Cancer-Related Post-Traumatic Stress (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of cancer-related post-traumatic stress. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

Key Points for This Section
- People react in different ways when they hear they have cancer.
- PTS can occur at any point during the cancer journey.

### People react in different ways when they hear they have cancer.

Patients have a range of normal reactions when they hear they have cancer. These include:

- Repeated frightening thoughts.
- Being distracted or overexcited.
- Trouble sleeping.
- Feeling detached from oneself or reality.

These reactions may also be symptoms of cancer-related post-traumatic stress (PTS). Talk with your health care team if you continue to have these symptoms.

### PTS can occur at any point during the cancer journey.

Patients with cancer may have symptoms of post-traumatic stress at any point from diagnosis through treatment, after treatment is complete, or during recurrence. Adult survivors of childhood cancer and their families may also have post-traumatic stress.

Cancer-related PTS may or may not lead to post-traumatic stress disorder (PTSD). PTSD is a specific group of symptoms that affect survivors of stressful events. These events usually involve the threat of death or serious injury to oneself or others. Cancer and its treatment may cause distress, but it does not mean it will develop into PTSD. Your health care team will evaluate your symptoms during your cancer journey.

## Factors That Affect the Risk of Cancer-Related Post-Traumatic Stress (PTS)

Key Points for This Section
- Certain factors may make it more likely that a patient will have PTS.
  - Physical factors
  - Psychological, mental, and social factors
- Certain protective factors may make it less likely that a patient will develop PTS.
- PTS symptoms develop by conditioning.

### Certain factors may make it more likely that a patient will have PTS.

Not everyone is at increased risk of cancer-related post-traumatic stress. Certain physical and mental factors that are linked to PTS or PTSD have been reported in studies:

#### Physical factors

- Cancer that recurs (comes back) was shown to increase stress symptoms in patients.
- In survivors of childhood cancer, symptoms of PTS occurred more often when there was a longer treatment time.
- Breast cancer survivors who had advanced cancer, long surgeries, or a history of trauma or anxiety disorders, were more likely to be diagnosed with PTSD.

#### Psychological, mental, and social factors

- Previous trauma.
- High level of general stress.
- Genetic factors and biological factors (such as a hormone disorder) that affect memory and learning.
- Lack of social support.
- Threat to life and body.
- Having PTSD or other psychological problems before being diagnosed with cancer.
- The use of avoidance to cope with stress.

### Certain protective factors may make it less likely that a patient will develop PTS.

Cancer patients may have a lower risk of PTS if they have the following:

- Good social support.
- Clear information about the stage of their cancer.
- An open relationship with their health care providers.

### PTS symptoms develop by conditioning.

Conditioning occurs when certain triggers become linked with an upsetting event. Neutral triggers (such as smells, sounds, and sights) that occurred at the same time as upsetting triggers (such as chemotherapy or painful treatments) later cause anxiety, stress, and fear even when they occur alone, after the trauma has ended.

In patients who have a history of PTSD from a previous trauma, symptoms may start again by certain triggers during their cancer treatment (for example, being inside MRI or CT scanners). These patients also may have problems adjusting to cancer and cancer treatment.

## Screening for Cancer-Related Post-Traumatic Stress (PTS)

Key Points for This Section
- The cancer experience is more than one stressful event.
- The specific cause of cancer-related PTS may be unknown.
- Symptoms of cancer-related PTS are a lot like symptoms of other stress-related disorders.

### The cancer experience is more than one stressful event.

Cancer may involve stressful events that repeat or continue over time. The patient may suffer symptoms of post-traumatic stress anytime from diagnosis through treatment and possible cancer recurrence, so screening may be needed more than once. The health care team will look for symptoms of PTS or PTSD.

### The specific cause of cancer-related PTS may be unknown.

For a patient coping with cancer, the specific trauma that triggers cancer-related post-traumatic stress isn't always known. Because the cancer experience involves so many upsetting events, it is much harder to know the exact cause of stress than it is for other traumas, such as natural disasters or physical assault.

### Symptoms of cancer-related PTS are a lot like symptoms of other stress-related disorders.

PTS has many of the same symptoms as depression, anxiety disorders, and phobias.

Some of the symptoms that may be seen in PTS and in other conditions include:

- Feeling defensive, irritable, or fearful.
- Being unable to think clearly.
- Sleeping problems.
- Avoiding people.
- Avoiding stressful memories.
- Guilt and self-blame.
- Loss of interest in life.

## Treatment of Cancer-Related Post-Traumatic Stress (PTS)

Key Points for This Section
- Treatments used for PTS may be the same as treatments for PTSD.
- Talking with a counselor, relaxation training, and support groups may help reduce symptoms of PTS.
- Medicines may help severe symptoms of PTS.

### Treatments used for PTS may be the same as treatments for PTSD.

Although there are no specific treatments for PTS in patients with cancer, treatments used for people with PTSD can be useful in relieving distress in cancer patients and survivors.

### Talking with a counselor, relaxation training, and support groups may help reduce symptoms of PTS.

A crisis intervention may be used to relieve distress and help the patient return to normal activities. This method focuses on solving problems, teaching coping skills, and providing a supportive setting for the patient.

Some patients are helped by methods that teach them to change their behaviors by changing their thinking patterns. Through cognitive behavioral therapy (CBT), patients may:

- Understand their symptoms.
- Learn ways to cope and to manage stress (such as relaxation training).
- Become aware of thinking patterns that cause distress and negative emotions and replace them with more balanced and useful ways of thinking.
- Become less sensitive to upsetting triggers.

Support groups may also help people who have PTS symptoms. In the group setting, patients can get emotional support, learn coping skills, and meet others with similar experiences and symptoms.

### Medicines may help severe symptoms of PTS.

For patients with severe symptoms of PTS, medicines may be used. For example:

- Tricyclic and monoamine oxidase inhibitor (MOA) antidepressants may be used when PTS occurs along with depression.
- Selective serotonin reuptake inhibitors (SSRIs) such as fluoxetine may reduce the stress that occurs in what is known as the "fight-or-flight syndrome".
- Antianxiety medicines may help reduce symptoms of anxiety. In certain cases, antipsychotic medicines may reduce severe flashbacks.

## Post-Traumatic Stress in Children With Cancer and Cancer Survivors

Key Points for This Section
- Children and teens with cancer may be at risk for post-traumatic stress disorder (PTSD).
- Cancer survivors with PTS need early treatment with methods that are used to treat other trauma victims.
- Cancer survivors and their families need long-term monitoring for PTS.

### Children and teens with cancer may be at risk for post-traumatic stress disorder (PTSD).

In children and teens with cancer, symptoms of PTS or PTSD may occur during treatment or after treatment has ended. Those who feel very uncertain about their disease and future may be more likely to have PTSD symptoms.

Childhood cancer survivors who are diagnosed with PTSD are more likely to have depression, lower satisfaction with life, and lack of daily life skills.

### Cancer survivors with PTS need early treatment with methods that are used to treat other trauma victims.

Effects of PTS are long-lasting and serious. It may affect the patient's ability to have a normal lifestyle and may affect personal relationships, education, and employment. Patients may avoid getting professional care to avoid places and persons linked with cancer.

It is important that cancer survivors are aware of the possible mental distress of living with cancer and the need for early treatment of PTS. Follow-up cancer care may be given by the cancer treatment doctor or the main provider, such as the family doctor. Many survivors get help from therapists who are experts in helping people who are recovering from cancer. More than one kind of treatment may be used.

### Cancer survivors and their families need long-term monitoring for PTS.

Symptoms of PTS usually begin within the first 3 months after the trauma, but sometimes they do not appear for months or even years. Therefore, cancer survivors and their families need long-term monitoring. For more information, see Adjustment to Cancer: Anxiety and Distress.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of cancer-related post-traumatic stress. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cancer-Related Post-Traumatic Stress. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/survivorship/new-normal/ptsd-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389374]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).